# Childhood Ovarian Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of pediatric ovarian cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Childhood Ovarian Cancer

Most ovarian masses in children are not malignant.[1] The most common malignant neoplasms are germ cell tumors, followed by epithelial tumors, stromal tumors, and then other tumors such as Burkitt lymphoma.[2-5]

Most malignant ovarian tumors occur in girls aged 15 to 19 years.[6]

### References

Lawrence AE, Gonzalez DO, Fallat ME, et al.: Factors Associated With Management of Pediatric Ovarian Neoplasms. Pediatrics 144 (1): , 2019.31164439
Morowitz M, Huff D, von Allmen D: Epithelial ovarian tumors in children: a retrospective analysis. J Pediatr Surg 38 (3): 331-5; discussion 331-5, 2003.12632344
Schultz KA, Sencer SF, Messinger Y, et al.: Pediatric ovarian tumors: a review of 67 cases. Pediatr Blood Cancer 44 (2): 167-73, 2005.15490488
Aggarwal A, Lucco KL, Lacy J, et al.: Ovarian epithelial tumors of low malignant potential: a case series of 5 adolescent patients. J Pediatr Surg 44 (10): 2023-7, 2009.19853767
You W, Dainty LA, Rose GS, et al.: Gynecologic malignancies in women aged less than 25 years. Obstet Gynecol 105 (6): 1405-9, 2005.15932836
Brookfield KF, Cheung MC, Koniaris LG, et al.: A population-based analysis of 1037 malignant ovarian tumors in the pediatric population. J Surg Res 156 (1): 45-9, 2009.19592022

## Stage Information for Ovarian Cancer

The Fédération Internationale de Gynécologie et d’Obstétrique (FIGO) staging system has been used for ovarian cancers (see Table 1).

Table 1. FIGO Staging for Carcinoma of the Ovary^a^

Stage | | Description
I | | Tumor confined to the ovary.
IA | | Tumor limited to one ovary (capsule intact); no tumor on surface of the ovary; no malignant cells in the ascites or peritoneal washings.
IB | | Tumor limited to both ovaries (capsules intact); no tumor on surface of the ovary; no malignant cells in the ascites or peritoneal washings.
IC | | Tumor limited to one or both ovaries, with any of the following:
| IC1 | Surgical spill.
| IC2 | Capsule ruptured before surgery or tumor on the surface of the ovary.
| IC3 | Malignant cells in the ascites or peritoneal washings.
II | | Tumor involves one or both ovaries with pelvic extension (below pelvic brim) or primary peritoneal cancer.
IIA | | Extension and/or implants on uterus and/or fallopian tubes.
IIB | | Extension to other pelvic intraperitoneal tissues.
III | | Tumor involves one or both ovaries or primary peritoneal cancer, with cytologically or histologically confirmed spread to the peritoneum outside the pelvis and/or metastasis to the retroperitoneal lymph nodes.
IIIA1 | | Positive retroperitoneal lymph nodes only (cytologically or histologically proven):
| IIIA1(i) | Lymph nodes ≤10 mm in greatest dimension.
| IIIA1(ii) | Lymph nodes >10 mm in greatest dimension.
IIIA2 | | Microscopic extrapelvic (above the pelvic brim) peritoneal involvement with or without positive retroperitoneal lymph nodes.
IIIB | | Macroscopic peritoneal metastasis beyond the pelvis ≤2 cm in greatest dimension, with or without metastasis to the retroperitoneal lymph nodes.
IIIC | | Macroscopic peritoneal metastasis beyond the pelvis >2 cm in greatest dimension, with or without metastasis to the retroperitoneal lymph nodes (includes extension of tumor to capsule of liver and spleen without parenchymal involvement of either organ).
IV | | Distant metastasis excluding peritoneal metastases.
IVA | | Pleural effusion with positive cytology.
IVB | | Parenchymal metastases and metastases to extra-abdominal organs (including inguinal lymph nodes and lymph nodes outside of the abdominal cavity).

FIGO = Fédération Internationale de Gynécologie et d’Obstétrique.

^a^Adapted from Berek et al.[1]

### References

Berek JS, Renz M, Kehoe S, et al.: Cancer of the ovary, fallopian tube, and peritoneum: 2021 update. Int J Gynaecol Obstet 155 (Suppl 1): 61-85, 2021.34669199

## Childhood Epithelial Ovarian Neoplasia

### Clinical Presentation, Histology, and Prognosis

The most common presenting symptoms of ovarian tumors in children are dysmenorrhea and abdominal pain.

Ovarian tumors derived from malignant epithelial elements include the following types:

- Serous cystomas.
- Mucinous cystomas.
- Endometrial tumors.
- Clear cell tumors.

There are subtypes within each tumor type. The subtypes include benign tumors, tumors with low malignant potential or borderline tumors, and adenocarcinomas. Most ovarian tumors in pediatric patients are benign and borderline,[1] with rare malignant lesions in adolescent patients.[2] Studies have reported the following:

- In the Italian prospective multicenter study of rare tumors (TREP project), 16 patients were identified during a 14-year period. Eight patients had benign tumors (seven mucinous cystadenoma and one serous cystadenoma), and eight patients had borderline tumors (two serous and six mucinous).[3][Level of evidence C1] No malignant tumors were identified. High levels of cancer antigen 125 were detected in 6 of 15 patients.
- In another series of 19 patients younger than 21 years with epithelial ovarian neoplasms, the average age at diagnosis was 19.7 years. Dysmenorrhea and abdominal pain were the most common presenting symptoms. Low malignant potential or well-differentiated tumors were diagnosed in 84% of patients. Seventy-nine percent of the patients had stage I disease, with a 100% survival rate. Only patients who had small cell anaplastic carcinomas died.[4][Level of evidence C1]
- A series of female patients younger than 19 years with borderline or malignant epithelial ovarian tumors in the Surveillance, Epidemiology, and End Results (SEER) Program database reported the following:[5]
  - There were 114 cases of borderline ovarian tumors identified. Of these, 53.5% were serous histology and 44.8% were mucinous histology. The 10-year overall survival (OS) rate was 97.3% for these patients.
  - There were 140 cases of malignant epithelial ovarian tumors identified. The median age of these patients was 17 years. Mucinous (56.4%) and serous (20.7%) adenocarcinoma were the most common histologies. Most patients had stage I disease (70.2%). Fertility-sparing surgery was commonly performed (rate of uterine preservation for stage I disease, 91.7%). The 5-year OS rate was 93.6% for patients with stage I disease, compared with 48.3% for those with extra-ovarian spread.

Girls with ovarian carcinoma (epithelial ovarian neoplasia) fare better than do adults with similar histology, probably because girls usually present with low-stage disease.[4,5]

The potential association with genetic predisposition (e.g., BRCA variant) in pediatric patients has not yet been studied.

### Treatment of Childhood Epithelial Ovarian Neoplasia

Treatment options for nonmalignant childhood epithelial ovarian neoplasia include the following:

1. Surgery alone.

Treatment of epithelial ovarian neoplasia is based on stage and histology. Most pediatric and adolescent patients have stage I disease. In the TREP study,[3] of the eight patients with benign tumors, seven patients had stage I disease, and one patient had stage III disease. Of the eight patients with borderline tumors, three patients had stage I disease, and five patients had stage III disease (based on washings and omental implants). All 16 patients were treated with surgery alone. At the time of the report, 15 patients were alive without disease; the one death was not from ovarian cancer.

Treatment options for childhood malignant ovarian epithelial cancer include the following:

1. Surgery.
2. Chemotherapy.

Treatment of malignant ovarian epithelial cancer is stage-related and follows adult protocols, which may include surgery and chemotherapy. For more information, see Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancer Treatment.

### References

Childress KJ, Patil NM, Muscal JA, et al.: Borderline Ovarian Tumor in the Pediatric and Adolescent Population: A Case Series and Literature Review. J Pediatr Adolesc Gynecol 31 (1): 48-54, 2018.28899828
Hazard FK, Longacre TA: Ovarian surface epithelial neoplasms in the pediatric population: incidence, histologic subtype, and natural history. Am J Surg Pathol 37 (4): 548-53, 2013.23388124
Virgone C, Alaggio R, Dall'Igna P, et al.: Epithelial Tumors of the Ovary in Children and Teenagers: A Prospective Study from the Italian TREP Project. J Pediatr Adolesc Gynecol 28 (6): 441-6, 2015.26220350
Tsai JY, Saigo PE, Brown C, et al.: Diagnosis, pathology, staging, treatment, and outcome of epithelial ovarian neoplasia in patients age < 21 years. Cancer 91 (11): 2065-70, 2001.11391586
Nasioudis D, Alevizakos M, Holcomb K, et al.: Malignant and borderline epithelial ovarian tumors in the pediatric and adolescent population. Maturitas 96: 45-50, 2017.28041594

## Childhood Sex Cord–Stromal Tumors

### General Information About Sex Cord–Stromal Tumors

#### Clinical presentation

The clinical presentation and prognosis of patients with sex cord–stromal tumors vary by histology. In all entities, metastatic spread occurs rarely and, if present, is usually limited to the peritoneal cavity.[1] Distant metastases mostly occur in patients whose disease has relapsed. Some tumors may be associated with hormone secretion—for example, estrogen in granulosa cell tumors or androgens in Sertoli-Leydig cell tumors.[2]

#### Diagnostic evaluation

In the United States, these tumors may be registered in the International Testicular and Ovarian Stromal Tumor Registry (https://www.otstregistry.org/).[3] In Europe, patients are prospectively registered in the national rare tumor groups.[3,4] The recommendations regarding diagnostic work-up, staging, and therapeutic strategy have been harmonized between these registries.[3]

The European Cooperative Study Group for Pediatric Rare Tumors (https://www.raretumors-children.eu/) within the PARTNER project (Paediatric Rare Tumours Network - European Registry) (https://www.raretumors-children.eu/partner-project/) has published comprehensive recommendations for the diagnosis and treatment of sex cord–stromal tumors in children and adolescents.[5]

#### Histology and molecular features

Ovarian sex cord–stromal tumors are a heterogeneous group of rare tumors that derive from the gonadal non–germ cell component.[1] Histological subtypes display some areas of gonadal differentiation and include juvenile (and, rarely, adult) granulosa cell tumors, Sertoli-Leydig cell tumors, and sclerosing stromal tumors. Other histological subtypes, such as steroid cell tumor, sex cord tumor with annular tubules, or thecoma, are exceedingly rare.

Ovarian Sertoli-Leydig cell tumors in children and adolescents are commonly associated with the presence of germline DICER1 pathogenic variants and may be a manifestation of familial pleuropulmonary blastoma syndrome.[6] A two-institution study analyzed eight children aged 4 to 16 years who were diagnosed with Sertoli-Leydig cell tumors. All eight tumors were found to harbor somatic hotspot DICER1 variants, and five patients carried germline DICER1 pathogenic variants (two of them had the phenotype of DICER1 syndrome).[7] Individuals with Sertoli-Leydig cell tumor were enrolled in the International Pleuropulmonary Blastoma/DICER1 Registry and/or the International Ovarian and Testicular Stromal Tumor Registry.[8] In total, 191 participants with ovarian Sertoli-Leydig cell tumor were enrolled, with most presenting with Fédération Internationale de Gynécologie et d’Obstétrique (FIGO) stage I disease (92%, 175 of 191 patients). Germline DICER1 variant testing results were available for 156 patients; 58% of these patients had a pathogenic or likely pathogenic germline variant. Somatic DICER1 variant testing showed RNase IIIB hotspot variants in 97% (88 of 91) of intermediate- and poorly differentiated tumors.

#### Prognostic factors

Prognostic factors related to stage and high mitotic count have been identified. In a report from the German Maligne Keimzelltumoren (MAKEI) study, 54 children and adolescents with prospectively registered sex cord–stromal tumors were analyzed. Forty-eight patients presented with stage I tumors, and six patients had peritoneal metastases. While overall prognosis was favorable, patients at risk could be identified by stage (stage IC, preoperative rupture, stages II and III) and histological criteria such as high mitotic count.[9]

A study of 44 patients from the European Cooperative Study Group on Pediatric Rare Tumors showed that stage and histopathologic differentiation determined the prognosis of patients with Sertoli-Leydig cell tumors.[10]

Individuals with Sertoli-Leydig cell tumor were enrolled in the International Pleuropulmonary Blastoma/DICER1 Registry and/or the International Ovarian and Testicular Stromal Tumor Registry.[8] In total, 191 participants with ovarian Sertoli-Leydig cell tumor were enrolled. Adjuvant chemotherapy was administered to 40% of patients (77 of 191). Among these patients, nearly all received platinum-based regimens (95%, 73 of 77), and 30% (23 of 77) received regimens that included an alkylating agent. The 3-year recurrence-free survival rate was 93.6% (95% confidence interval [CI], 88.2%–99.3%) for patients with stage IA tumors, compared with 67.1% (95% CI, 55.2%–81.6%) for patients with stage IC tumors and 60.6% (95% CI, 40.3%–91.0%) for patients with stage II to stage IV tumors (P < .001). Among patients with FIGO stage I tumors, those with mesenchymal heterologous elements who were treated with surgery alone were at higher risk of recurrence (hazard ratio [HR], 74.18; 95% CI, 17.99–305.85).

#### Treatment of childhood sex cord–stromal tumors

Treatment options for childhood sex cord–stromal tumors include the following:

1. Surgery.
2. Chemotherapy.

A French registry identified 38 girls younger than 18 years with ovarian sex cord–stromal tumors.[2]

- Complete surgical resection was achieved in 23 of 38 girls who did not receive adjuvant treatment.
- Two patients who had a complete surgical resection had recurrent disease. One patient's tumor responded to chemotherapy, and the other patient died.
- Fifteen girls had tumor rupture and/or ascites. Eleven of the 15 patients received chemotherapy and did not have a disease recurrence. Of the four patients who did not receive chemotherapy, all had a recurrence and two died.

### Childhood Juvenile Granulosa Cell Tumors

The most common histological subtype of sex cord–stromal tumors in girls younger than 18 years is juvenile granulosa cell tumor (median age, 7.6 years; range, birth to 17.5 years).[11,12] Juvenile granulosa cell tumors represent about 5% of ovarian tumors in children and adolescents and are distinct from the granulosa cell tumors seen in adults.[1,13]

#### Risk factors

Juvenile granulosa cell tumors have been reported in children with Ollier disease and Maffucci syndrome.[14-16]

#### Clinical presentation

Patients with juvenile granulosa cell tumors present with the following symptoms:[17,18]

- Precocious puberty (most common; caused by estrogen secretion).
- Abdominal pain.
- Abdominal mass.
- Ascites.

#### Treatment of childhood juvenile granulosa cell tumors

Treatment options for childhood juvenile granulosa cell tumors include the following:

1. Surgery.
2. Chemotherapy.

##### Surgery

As many as 90% of children with juvenile granulosa cell tumors will have low-stage disease (stage I) by FIGO criteria. These patients are usually curable with unilateral salpingo-oophorectomy alone. In one series, 15 of 17 patients underwent fertility-sparing surgery, and only two patients received adjuvant chemotherapy. No recurrences were reported.[19]

##### Chemotherapy

Patients with spontaneous tumor rupture or malignant ascites (FIGO stage IC2, IC3), advanced disease (FIGO stages II–IV), or tumors with high mitotic activity have a poorer prognosis and require chemotherapy.[2,4,13] Cisplatin-based chemotherapy regimens have been used with some success in both the adjuvant and recurrent disease settings.[4,11,20-22]

### Childhood Sertoli-Leydig Cell Tumors

#### Clinical presentation and risk factors

Sertoli-Leydig cell tumor is a common histological subtype of sex cord–stromal tumors. It is rare in young girls and more frequently seen in adolescents. The tumor may secrete androgens and, thus, present with virilization, secondary amenorrhea,[23] or precocious puberty.[24]

These tumors may be associated with Peutz-Jeghers syndrome, but more frequently are a part of the DICER1-tumor spectrum.[6,25,26] Patients with Sertoli-Leydig cell tumors should be evaluated for germline DICER1 pathogenic variants. If a germline DICER1 pathogenic variant is found, regular follow-up for ovarian and other tumors such as thyroid disease (multinodular goiter, carcinoma) should be considered. Genetic counseling should also be considered.[26,27]

#### Treatment and outcome of childhood Sertoli-Leydig cell tumors

Treatment options for childhood Sertoli-Leydig cell tumors include the following:

1. Surgery.
2. Chemotherapy.

##### Surgery

Surgery is the primary treatment for Sertoli-Leydig cell tumors and is the only treatment for low-stage disease (FIGO stage IA). The event-free survival rate for these patients is approximately 100%.[2][Level of evidence C1] However, up to 10% of patients may develop metachronous contralateral tumors, particularly in the context of underlying DICER1 germline pathogenic variants.[28]

##### Chemotherapy

Patients with Sertoli-Leydig cell tumors with abdominal spillage during surgery, spontaneous tumor rupture, or metastatic disease (FIGO stages IC, II, III, and IV) are treated with cisplatin-based combination chemotherapy, although the impact of chemotherapy has not been studied in clinical trials in children.[2,10]

One study reported on 40 women (average age, 28 years) with FIGO stage I or IC Sertoli-Leydig cell tumors of the ovary.[29][Level of evidence C1]

- Of 34 patients with intermediate or poor differentiation, 23 patients received postoperative chemotherapy (most regimens included cisplatin). None of these patients experienced disease recurrence.
- Of the 11 patients who did not receive postoperative chemotherapy, two had disease recurrence. Both of these patients had tumors that were salvaged with chemotherapy.

### References

Schneider DT, Jänig U, Calaminus G, et al.: Ovarian sex cord-stromal tumors--a clinicopathological study of 72 cases from the Kiel Pediatric Tumor Registry. Virchows Arch 443 (4): 549-60, 2003.12910419
Fresneau B, Orbach D, Faure-Conter C, et al.: Sex-Cord Stromal Tumors in Children and Teenagers: Results of the TGM-95 Study. Pediatr Blood Cancer 62 (12): 2114-9, 2015.26206391
Schultz KA, Schneider DT, Pashankar F, et al.: Management of ovarian and testicular sex cord-stromal tumors in children and adolescents. J Pediatr Hematol Oncol 34 (Suppl 2): S55-63, 2012.22525408
Schneider DT, Calaminus G, Harms D, et al.: Ovarian sex cord-stromal tumors in children and adolescents. J Reprod Med 50 (6): 439-46, 2005.16050568
Schneider DT, Orbach D, Ben-Ami T, et al.: Consensus recommendations from the EXPeRT/PARTNER groups for the diagnosis and therapy of sex cord stromal tumors in children and adolescents. Pediatr Blood Cancer 68 (Suppl 4): e29017, 2021.33760357
Schultz KA, Pacheco MC, Yang J, et al.: Ovarian sex cord-stromal tumors, pleuropulmonary blastoma and DICER1 mutations: a report from the International Pleuropulmonary Blastoma Registry. Gynecol Oncol 122 (2): 246-50, 2011.21501861
Yang B, Chour W, Salazar CG, et al.: Pediatric Sertoli-Leydig Cell Tumors of the Ovary: An Integrated Study of Clinicopathological Features, Pan-cancer-Targeted Next-generation Sequencing and Chromosomal Microarray Analysis From a Single Institution. Am J Surg Pathol 48 (2): 194-203, 2024.37946548
Nelson AT, Harris AK, Watson D, et al.: Outcomes in ovarian Sertoli-Leydig cell tumor: A report from the International Pleuropulmonary Blastoma/DICER1 and Ovarian and Testicular Stromal Tumor Registries. Gynecol Oncol 186: 117-125, 2024.38657450
Schneider DT, Calaminus G, Wessalowski R, et al.: Ovarian sex cord-stromal tumors in children and adolescents. J Clin Oncol 21 (12): 2357-63, 2003.12805338
Schneider DT, Orbach D, Cecchetto G, et al.: Ovarian Sertoli Leydig cell tumours in children and adolescents: an analysis of the European Cooperative Study Group on Pediatric Rare Tumors (EXPeRT). Eur J Cancer 51 (4): 543-50, 2015.25514863
Calaminus G, Wessalowski R, Harms D, et al.: Juvenile granulosa cell tumors of the ovary in children and adolescents: results from 33 patients registered in a prospective cooperative study. Gynecol Oncol 65 (3): 447-52, 1997.9190974 97334277
Capito C, Flechtner I, Thibaud E, et al.: Neonatal bilateral ovarian sex cord stromal tumors. Pediatr Blood Cancer 52 (3): 401-3, 2009.19058207
Wu H, Pangas SA, Eldin KW, et al.: Juvenile Granulosa Cell Tumor of the Ovary: A Clinicopathologic Study. J Pediatr Adolesc Gynecol 30 (1): 138-143, 2017.27702598
Tanaka Y, Sasaki Y, Nishihira H, et al.: Ovarian juvenile granulosa cell tumor associated with Maffucci's syndrome. Am J Clin Pathol 97 (4): 523-7, 1992.1553918
Sampagar AA, Jahagirdar RR, Bafna VS, et al.: Juvenile granulosa cell tumor associated with Ollier disease. Indian J Med Paediatr Oncol 37 (4): 293-295, 2016 Oct-Dec.28144098
Littrell LA, Inwards CY, Hazard FK, et al.: Juvenile granulosa cell tumor associated with Ollier disease. Skeletal Radiol 52 (3): 605-612, 2023.35296906
Kalfa N, Patte C, Orbach D, et al.: A nationwide study of granulosa cell tumors in pre- and postpubertal girls: missed diagnosis of endocrine manifestations worsens prognosis. J Pediatr Endocrinol Metab 18 (1): 25-31, 2005.15679066
Gell JS, Stannard MW, Ramnani DM, et al.: Juvenile granulosa cell tumor in a 13-year-old girl with enchondromatosis (Ollier's disease): a case report. J Pediatr Adolesc Gynecol 11 (3): 147-50, 1998.9704306 98369929
Bergamini A, Ferrandina G, Candotti G, et al.: Stage I juvenile granulosa cell tumors of the ovary: A multicentre analysis from the MITO-9 study. Eur J Surg Oncol 47 (7): 1705-1709, 2021.33583630
Vassal G, Flamant F, Caillaud JM, et al.: Juvenile granulosa cell tumor of the ovary in children: a clinical study of 15 cases. J Clin Oncol 6 (6): 990-5, 1988.3373268 88229818
Powell JL, Connor GP, Henderson GS: Management of recurrent juvenile granulosa cell tumor of the ovary. Gynecol Oncol 81 (1): 113-6, 2001.11277661 21175881
Schneider DT, Calaminus G, Wessalowski R, et al.: Therapy of advanced ovarian juvenile granulosa cell tumors. Klin Padiatr 214 (4): 173-8, 2002 Jul-Aug.12165898 22155557
Arhan E, Cetinkaya E, Aycan Z, et al.: A very rare cause of virilization in childhood: ovarian Leydig cell tumor. J Pediatr Endocrinol Metab 21 (2): 181-3, 2008.18422031
Choong CS, Fuller PJ, Chu S, et al.: Sertoli-Leydig cell tumor of the ovary, a rare cause of precocious puberty in a 12-month-old infant. J Clin Endocrinol Metab 87 (1): 49-56, 2002.11788622
Zung A, Shoham Z, Open M, et al.: Sertoli cell tumor causing precocious puberty in a girl with Peutz-Jeghers syndrome. Gynecol Oncol 70 (3): 421-4, 1998.9790799
Schultz KA, Harris A, Messinger Y, et al.: Ovarian tumors related to intronic mutations in DICER1: a report from the international ovarian and testicular stromal tumor registry. Fam Cancer 15 (1): 105-10, 2016.26289771
Schultz KAP, Williams GM, Kamihara J, et al.: DICER1 and Associated Conditions: Identification of At-risk Individuals and Recommended Surveillance Strategies. Clin Cancer Res 24 (10): 2251-2261, 2018.29343557
Schultz KAP, Harris AK, Finch M, et al.: DICER1-related Sertoli-Leydig cell tumor and gynandroblastoma: Clinical and genetic findings from the International Ovarian and Testicular Stromal Tumor Registry. Gynecol Oncol 147 (3): 521-527, 2017.29037807
Gui T, Cao D, Shen K, et al.: A clinicopathological analysis of 40 cases of ovarian Sertoli-Leydig cell tumors. Gynecol Oncol 127 (2): 384-9, 2012.22850410

## Childhood Small Cell Carcinoma of the Ovary, Hypercalcemia-Type

Small cell carcinomas of the ovary are exceedingly rare and aggressive.[1] The prognosis is poor for these patients. This cancer may be associated with hypercalcemia.[2]

### Molecular Features

Somatic and germline SMARCA4 pathogenic variants have been reported in small cell carcinoma of the ovary, hypercalcemia-type. This finding suggests potential molecular and biological similarities to rhabdoid tumors.[3-5] However, one study of children with small cell carcinoma of the ovary, hypercalcemia-type, revealed that this tumor appears molecularly distinct from extracranial rhabdoid tumors with either SMARCA4 or SMARCB1 alterations. In this study, tumors underwent genomic analysis that included RNA sequencing (n = 11) and methylation profiling (n = 9). These findings support their continued classification as different tumor types.[6]

For more information about SMARCA4, visit Rhabdoid Tumor Predisposition Syndrome Type 2.

### Treatment of Childhood Small Cell Carcinoma of the Ovary, Hypercalcemia-Type

Treatment options for childhood small cell carcinoma of the ovary, hypercalcemia-type, include the following:

1. Aggressive multimodality therapy.
2. Tazemetostat.

#### Aggressive multimodality therapy

Successful treatment has been reported in a few cases using aggressive therapy, including surgery and high-dose chemotherapy with stem cell rescue.[2,7-9][Level of evidence C1]

#### Tazemetostat

Tazemetostat is an EZH2 inhibitor that demonstrates activity against preclinical models of small cell carcinoma of the ovary with SMARCA4 loss.[10]

Evidence (tazemetostat):

1. Two patients with small cell carcinoma of the ovary and SMARCA4 loss were enrolled in a phase I trial of tazemetostat.[11]
  - One patient achieved a partial response, and one patient achieved prolonged stable disease.
  - The most common toxicities associated with tazemetostat were asthenia, anemia, anorexia, muscle spasms, nausea, and vomiting.

### References

Wens FSPL, Hulsker CCC, Fiocco M, et al.: Small Cell Carcinoma of the Ovary, Hypercalcemic Type (SCCOHT): Patient Characteristics, Treatment, and Outcome-A Systematic Review. Cancers (Basel) 15 (15): , 2023.37568608
Distelmaier F, Calaminus G, Harms D, et al.: Ovarian small cell carcinoma of the hypercalcemic type in children and adolescents: a prognostically unfavorable but curable disease. Cancer 107 (9): 2298-306, 2006.16998935
Witkowski L, Goudie C, Foulkes WD, et al.: Small-Cell Carcinoma of the Ovary of Hypercalcemic Type (Malignant Rhabdoid Tumor of the Ovary): A Review with Recent Developments on Pathogenesis. Surg Pathol Clin 9 (2): 215-26, 2016.27241105
Ramos P, Karnezis AN, Craig DW, et al.: Small cell carcinoma of the ovary, hypercalcemic type, displays frequent inactivating germline and somatic mutations in SMARCA4. Nat Genet 46 (5): 427-9, 2014.24658001
Witkowski L, Carrot-Zhang J, Albrecht S, et al.: Germline and somatic SMARCA4 mutations characterize small cell carcinoma of the ovary, hypercalcemic type. Nat Genet 46 (5): 438-43, 2014.24658002
Andrianteranagna M, Cyrta J, Masliah-Planchon J, et al.: SMARCA4-deficient rhabdoid tumours show intermediate molecular features between SMARCB1-deficient rhabdoid tumours and small cell carcinomas of the ovary, hypercalcaemic type. J Pathol 255 (1): 1-15, 2021.33999421
Pressey JG, Kelly DR, Hawthorne HT: Successful treatment of preadolescents with small cell carcinoma of the ovary hypercalcemic type. J Pediatr Hematol Oncol 35 (7): 566-9, 2013.23459374
Christin A, Lhomme C, Valteau-Couanet D, et al.: Successful treatment for advanced small cell carcinoma of the ovary. Pediatr Blood Cancer 50 (6): 1276-7, 2008.18293381
Kanwar VS, Heath J, Krasner CN, et al.: Advanced small cell carcinoma of the ovary in a seventeen-year-old female, successfully treated with surgery and multi-agent chemotherapy. Pediatr Blood Cancer 50 (5): 1060-2, 2008.17914739
Chan-Penebre E, Armstrong K, Drew A, et al.: Selective Killing of SMARCA2- and SMARCA4-deficient Small Cell Carcinoma of the Ovary, Hypercalcemic Type Cells by Inhibition of EZH2: In Vitro and In Vivo Preclinical Models. Mol Cancer Ther 16 (5): 850-860, 2017.28292935
Italiano A, Soria JC, Toulmonde M, et al.: Tazemetostat, an EZH2 inhibitor, in relapsed or refractory B-cell non-Hodgkin lymphoma and advanced solid tumours: a first-in-human, open-label, phase 1 study. Lancet Oncol 19 (5): 649-659, 2018.29650362

## Treatment Options Under Clinical Evaluation for Childhood Ovarian Cancer

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

- PEPN2121 (NCT05286801) (https://www.cancer.gov/clinicaltrials/NCT05286801) (Tiragolumab and Atezolizumab for the Treatment of Relapsed or Refractory SMARCB1- or SMARCA4-Deficient Tumors): This trial is evaluating the combination of a PD-L1 targeting antibody (atezolizumab) with a TIGIT targeting antibody (tiragolumab) for patients with SMARCB1- or SMARCA4-deficient tumors. Patients with small cell carcinomas of the ovary, hypercalcemia type, may be eligible for this study.

## Special Considerations for the Treatment of Children With Cancer

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Ophthalmologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3-5] Childhood and adolescent cancer survivors require close monitoring because side effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Childhood cancer is a rare disease, with about 15,000 cases diagnosed annually in the United States in individuals younger than 20 years.[6] The U.S. Rare Diseases Act of 2002 (https://www.congress.gov/107/plaws/publ280/PLAW-107publ280.pdf) defines a rare disease as one that affects populations smaller than 200,000 people in the United States. Therefore, all pediatric cancers are considered rare.

The designation of a rare tumor is not uniform among pediatric and adult groups. In adults, rare cancers are defined as those with an annual incidence of fewer than six cases per 100,000 people. They account for up to 24% of all cancers diagnosed in the European Union and about 20% of all cancers diagnosed in the United States.[7,8] In children and adolescents, the designation of a rare tumor is not uniform among international groups, as follows:

- A consensus effort between the European Union Joint Action on Rare Cancers and the European Cooperative Study Group for Rare Pediatric Cancers estimated that 11% of all cancers in patients younger than 20 years could be categorized as very rare. This consensus group defined very rare cancers as those with annual incidences of fewer than two cases per 1 million people. However, three additional histologies (thyroid carcinoma, melanoma, and testicular cancer) with incidences of more than two cases per 1 million people were also included in the very rare group due to a lack of knowledge and expertise in the management of these tumors.[9]
- The Children's Oncology Group defines rare pediatric cancers as those listed in the International Classification of Childhood Cancer subgroup XI, which includes thyroid cancers, melanomas and nonmelanoma skin cancers, and multiple types of carcinomas (e.g., adrenocortical carcinomas, nasopharyngeal carcinomas, and most adult-type carcinomas such as breast cancers and colorectal cancers).[10] These diagnoses account for about 5% of the cancers diagnosed in children aged 0 to 14 years and about 27% of the cancers diagnosed in adolescents aged 15 to 19 years.[4]
  Most cancers in subgroup XI are either melanomas or thyroid cancers, with other cancer types accounting for only 2% of the cancers diagnosed in children aged 0 to 14 years and 9.3% of the cancers diagnosed in adolescents aged 15 to 19 years.

These rare cancers are extremely challenging to study because of the relatively few patients with any individual diagnosis, the predominance of rare cancers in the adolescent population, and the small number of clinical trials for adolescents with rare cancers.

Information about these tumors may also be found in sources relevant to adults with cancer, such as Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancer Treatment.

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Gatta G, Capocaccia R, Botta L, et al.: Burden and centralised treatment in Europe of rare tumours: results of RARECAREnet-a population-based study. Lancet Oncol 18 (8): 1022-1039, 2017.28687376
DeSantis CE, Kramer JL, Jemal A: The burden of rare cancers in the United States. CA Cancer J Clin 67 (4): 261-272, 2017.28542893
Ferrari A, Brecht IB, Gatta G, et al.: Defining and listing very rare cancers of paediatric age: consensus of the Joint Action on Rare Cancers in cooperation with the European Cooperative Study Group for Pediatric Rare Tumors. Eur J Cancer 110: 120-126, 2019.30785015
Pappo AS, Krailo M, Chen Z, et al.: Infrequent tumor initiative of the Children's Oncology Group: initial lessons learned and their impact on future plans. J Clin Oncol 28 (33): 5011-6, 2010.20956621

## Latest Updates to This Summary (03/03/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of pediatric ovarian cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Ovarian Cancer Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Arthur Kim Ritchey, MD (Children's Hospital of Pittsburgh of UPMC)
- Carlos Rodriguez-Galindo, MD (St. Jude Children's Research Hospital)
- Stephen J. Shochat, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Ovarian Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/ovarian/hp/child-ovarian-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 31846269]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).